# Colorectal Cancer Prevention (PDQ®)

Patient Version

This PDQ cancer information summary has current information about colorectal cancer prevention. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Date Last Modified") is the date of the most recent change. The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Screening and Prevention Editorial Board.

## What Is Prevention?

Cancer prevention is action taken to lower the chance of getting cancer. By preventing cancer, the number of new cases of cancer in a group or population is lowered. Hopefully, this will lower the number of deaths caused by cancer.

To prevent new cancers from starting, scientists look at risk factors and protective factors. Anything that increases your chance of developing cancer is called a cancer risk factor; anything that decreases your chance of developing cancer is called a cancer protective factor.

Some risk factors for cancer can be avoided, but many cannot. For example, both smoking and inheriting certain genes are risk factors for some types of cancer, but only smoking can be avoided. Regular exercise and a healthy diet may be protective factors for some types of cancer. Avoiding risk factors and increasing protective factors may lower your risk, but it does not mean that you will not get cancer.

Different ways to prevent cancer are being studied, including:

- changing lifestyle or eating habits
- avoiding things known to cause cancer
- taking medicines to treat a precancerous condition or to keep cancer from starting

## General Information About Colorectal Cancer

Key Points for This Section
- Colorectal cancer is a disease in which malignant (cancer) cells form in the tissues of the colon or the rectum.
- Colorectal cancer is the second leading cause of death from cancer in the United States.

### Colorectal cancer is a disease in which malignant (cancer) cells form in the tissues of the colon or the rectum.

The colon is part of the body's digestive system. The digestive system removes and processes nutrients (vitamins, minerals, carbohydrates, fats, proteins, and water) from foods and helps pass waste material out of the body. The digestive system is made up of the mouth, throat, esophagus, stomach, and the small and large intestines. The colon (large bowel) is the first part of the large intestine and is about 5 feet long. Together, the rectum and anal canal make up the last part of the large intestine and are 6 to 8 inches long. The anal canal ends at the anus (the opening of the large intestine to the outside of the body).

Anatomy of the lower gastrointestinal (digestive) system showing the colon, rectum, and anus. Other organs that make up the digestive system are also shown.

Gastrointestinal (digestive) system anatomy; drawing shows the esophagus, liver, stomach, colon, small intestine, rectum, and anus.

Cancer that begins in the colon is called colon cancer, and cancer that begins in the rectum is called rectal cancer. Cancer that affects either of these organs may also be called colorectal cancer.

Other PDQ summaries containing information related to colorectal cancer include:

- Colorectal Cancer Screening
- Colon Cancer Treatment
- Rectal Cancer Treatment
- Genetics of Colorectal Cancer (written for health professionals)

### Colorectal cancer is the second leading cause of death from cancer in the United States.

Colorectal cancer is the third most common cancer worldwide and the second leading cause of cancer death in the United States when numbers for men and women are combined. Between 2012 and 2021, the number of new colorectal cancer cases in the United States decreased. This decline was largely driven by falling rates in adults aged 65 and older, who continue to have the highest overall rates of colorectal cancer. The drop in older adults may be due in part to increased colorectal cancer screening, which can detect and remove precancerous growths before they develop into cancer. However, trends vary by age group. Among adults younger than 50, the number of new cases of colorectal cancer rose by about 2.4% per year, the largest increase among all age groups. In people aged 50 to 64, the number of new cases increased slightly per year.

Since 1970, the death rate from colorectal cancer has declined in men and women. However, new cases and deaths from colorectal cancer remain higher among Black people than other racial groups. Studies show that Black people are not more likely than others to have precancerous growths.

Finding and treating colorectal cancer early may prevent death from colorectal cancer. Screening tests may be used to help find colorectal cancer.

## Colorectal Cancer Prevention

Key Points for This Section
- Avoiding risk factors and increasing protective factors may help prevent cancer.
- The following risk factors increase the risk of colorectal cancer:
  - Age
  - Family history of colorectal cancer
  - Personal history
  - Inherited risk
  - Alcohol
  - Cigarette smoking
  - Race
  - Obesity
- The following protective factors decrease the risk of colorectal cancer:
  - Physical activity
  - Aspirin
  - Combination hormone replacement therapy
  - Polyp removal
- It is not clear if the following affect the risk of colorectal cancer:
  - Nonsteroidal anti-inflammatory drugs (NSAIDs) other than aspirin
  - Calcium
  - Diet
- The following factors do not affect the risk of colorectal cancer:
  - Hormone replacement therapy with estrogen only
  - Statins
- Cancer prevention clinical trials are used to study ways to prevent cancer.
- New ways to prevent colorectal cancer are being studied in clinical trials.

### Avoiding risk factors and increasing protective factors may help prevent cancer.

Avoiding cancer risk factors may help prevent certain cancers. Risk factors include smoking, having overweight, and not getting enough exercise. Increasing protective factors such as quitting smoking and exercising may also help prevent some cancers. Talk to your doctor or other health care professional about how you might lower your risk of cancer.

### The following risk factors increase the risk of colorectal cancer:

#### Age

The risk of colorectal cancer increases after age 50. Most cases of colorectal cancer are diagnosed after age 50.

#### Family history of colorectal cancer

Having a parent, brother, sister, or child with colorectal cancer doubles a person's risk of colorectal cancer.

#### Personal history

Having a personal history of the following conditions increases the risk of colorectal cancer:

- previous colorectal cancer
- high-risk adenomas (colorectal polyps that are 1 centimeter or larger in size or that have cells that look abnormal under a microscope)
- ovarian cancer
- inflammatory bowel disease (such as ulcerative colitis or Crohn disease)

#### Inherited risk

The risk of colorectal cancer is increased when certain gene changes linked to familial adenomatous polyposis (FAP) or hereditary nonpolyposis colon cancer (HNPCC or Lynch Syndrome) are inherited.

#### Alcohol

Drinking 3 or more alcoholic beverages per day increases the risk of colorectal cancer. Drinking alcohol is also linked to the risk of forming large colorectal adenomas (benign tumors).

#### Cigarette smoking

Cigarette smoking is linked to an increased risk of colorectal cancer and death from colorectal cancer.

Smoking cigarettes is also linked to an increased risk of forming colorectal adenomas. Cigarette smokers who have had surgery to remove colorectal adenomas are at an increased risk for the adenomas to recur (come back).

#### Race

Black individuals have an increased risk of colorectal cancer and death from colorectal cancer compared to other races.

#### Obesity

Obesity is linked to an increased risk of colorectal cancer and death from colorectal cancer.

### The following protective factors decrease the risk of colorectal cancer:

#### Physical activity

A lifestyle that includes regular physical activity is linked to a decreased risk of colorectal cancer.

#### Aspirin

Studies have shown that taking aspirin daily for at least two years lowers the risk of colorectal cancer and the risk of death from colorectal cancer. The decrease in risk begins 10 to 20 years after patients start taking aspirin.

The possible harms of aspirin use (100 mg or less) daily or every other day include an increased risk of stroke and bleeding in the stomach and intestines. These risks may be greater among the elderly, men, and those with conditions linked to a higher-than-normal risk of bleeding.

#### Combination hormone replacement therapy

Studies have shown that combination hormone replacement therapy (HRT) that includes both estrogen and progestin lowers the risk of invasive colorectal cancer in postmenopausal women.

However, in women who take combination HRT and do develop colorectal cancer, the cancer is more likely to be advanced when it is diagnosed and the risk of dying from colorectal cancer is not decreased.

The possible harms of combination HRT include an increased risk of:

- breast cancer
- heart disease
- blood clots

#### Polyp removal

Most colorectal polyps are adenomas, which may develop into cancer. Removing colorectal polyps that are larger than 1 centimeter (pea-sized) may lower the risk of colorectal cancer. It is not known if removing smaller polyps lowers the risk of colorectal cancer.

The possible harms of polyp removal during colonoscopy or sigmoidoscopy include a tear in the wall of the colon and bleeding.

Polyps in the colon. Some polyps have a stalk and others do not. Inset shows a photo of a polyp with a stalk.

Colon polyps; shows two polyps (one flat and one pedunculated) inside the colon. Inset shows photo of a pedunculated polyp.

### It is not clear if the following affect the risk of colorectal cancer:

#### Nonsteroidal anti-inflammatory drugs (NSAIDs) other than aspirin

It is not known if the use of nonsteroidal anti-inflammatory drugs or NSAIDs (such as sulindac, celecoxib, naproxen, and ibuprofen) lowers the risk of colorectal cancer.

Studies have shown that taking the nonsteroidal anti-inflammatory drug celecoxib reduces the risk of colorectal adenomas (benign tumors) coming back after they have been removed. It is not clear if this results in a lower risk of colorectal cancer.

Taking sulindac or celecoxib has been shown to reduce the number and size of polyps that form in the colon and rectum of people with familial adenomatous polyposis (FAP). It is not clear if this results in a lower risk of colorectal cancer.

The possible harms of NSAIDs include:

- kidney problems
- bleeding in the stomach, intestines, or brain
- heart problems such as heart attack and congestive heart failure

#### Calcium

It is not known if taking calcium supplements lowers the risk of colorectal cancer.

#### Diet

It is not known if a diet low in fat and meat and high in fiber, fruits, and vegetables lowers the risk of colorectal cancer.

Some studies have shown that a diet high in fat, proteins, calories, and meat increases the risk of colorectal cancer, but other studies have not.

### The following factors do not affect the risk of colorectal cancer:

#### Hormone replacement therapy with estrogen only

Hormone replacement therapy with estrogen only does not lower the risk of having invasive colorectal cancer or the risk of dying from colorectal cancer.

#### Statins

Studies have shown that taking statins (drugs that lower cholesterol) does not increase or decrease the risk of colorectal cancer.

### Cancer prevention clinical trials are used to study ways to prevent cancer.

Cancer prevention clinical trials are used to study ways to lower the risk of developing certain types of cancer. Some cancer prevention trials include healthy people who may or may not have an increased risk of cancer. Other prevention trials include people who have had cancer and are trying to prevent recurrence or a second cancer.

The purpose of some cancer prevention clinical trials is to find out whether actions people take can prevent cancer. These may include eating fruits and vegetables, exercising, quitting smoking, or taking certain medicines, vitamins, minerals, or food supplements.

### New ways to prevent colorectal cancer are being studied in clinical trials.

Information about clinical trials supported by NCI can be found on NCI’s clinical trials search (https://www.cancer.gov/research/participate/clinical-trials-search) webpage. Clinical trials supported by other organizations can be found on the ClinicalTrials.gov website.

## About This PDQ Summary

### About PDQ

Physician Data Query (PDQ) is the National Cancer Institute's (NCI's) comprehensive cancer information database. The PDQ database contains summaries of the latest published information on cancer prevention, detection, genetics, treatment, supportive care, and complementary and alternative medicine. Most summaries come in two versions. The health professional versions have detailed information written in technical language. The patient versions are written in easy-to-understand, nontechnical language. Both versions have cancer information that is accurate and up to date and most versions are also available in Spanish (https://www.cancer.gov/espanol/publicaciones/pdq).

PDQ is a service of the NCI. The NCI is part of the National Institutes of Health (NIH). NIH is the federal government’s center of biomedical research. The PDQ summaries are based on an independent review of the medical literature. They are not policy statements of the NCI or the NIH.

### Purpose of This Summary

This PDQ cancer information summary has current information about colorectal cancer prevention. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

### Reviewers and Updates

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Updated") is the date of the most recent change.

The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Screening and Prevention Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/screening-prevention).

### Clinical Trial Information

A clinical trial is a study to answer a scientific question, such as whether one treatment is better than another. Trials are based on past studies and what has been learned in the laboratory. Each trial answers certain scientific questions in order to find new and better ways to help cancer patients. During treatment clinical trials, information is collected about the effects of a new treatment and how well it works. If a clinical trial shows that a new treatment is better than one currently being used, the new treatment may become "standard." Patients may want to think about taking part in a clinical trial. Some clinical trials are open only to patients who have not started treatment.

Clinical trials can be found online at NCI's website (https://www.cancer.gov/research/participate/clinical-trials). For more information, call the Cancer Information Service (https://www.cancer.gov/contact/contact-center) (CIS), NCI's contact center, at 1-800-4-CANCER (1-800-422-6237).

### Permission to Use This Summary

PDQ is a registered trademark. The content of PDQ documents can be used freely as text. It cannot be identified as an NCI PDQ cancer information summary unless the whole summary is shown and it is updated regularly. However, a user would be allowed to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks in the following way: [include excerpt from the summary].”

The best way to cite this PDQ summary is:

PDQ® Screening and Prevention Editorial Board. PDQ Colorectal Cancer Prevention. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/types/colorectal/patient/colorectal-prevention-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389376]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use in the PDQ summaries only. If you want to use an image from a PDQ summary and you are not using the whole summary, you must get permission from the owner. It cannot be given by the National Cancer Institute. Information about using the images in this summary, along with many other images related to cancer can be found in Visuals Online (https://visualsonline.cancer.gov/). Visuals Online is a collection of more than 3,000 scientific images.

### Disclaimer

The information in these summaries should not be used to make decisions about insurance reimbursement. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s E-mail Us (https://www.cancer.gov/contact/email-us).